# Breast Cancer Prevention (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about breast cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Who Is at Risk?

Besides female sex, advancing age is the biggest risk factor for breast cancer. Reproductive factors that increase exposure to endogenous estrogen, such as early menarche and late menopause, increase risk, as does the use of combination estrogen-progesterone hormones after menopause. Nulliparity and alcohol consumption also are associated with increased risk.

Women with a family history or personal history of invasive breast cancer, ductal carcinoma in situ or lobular carcinoma in situ, or a history of breast biopsies that show benign proliferative disease have an increased risk of breast cancer.[1-4]

Increased breast density is associated with increased risk. It is often a heritable trait but is also seen more frequently in nulliparous women, women whose first pregnancy occurs late in life, and women who use postmenopausal hormones and alcohol.

Exposure to ionizing radiation, especially during puberty or young adulthood, and the inheritance of detrimental genetic mutations increase breast cancer risk.

### References

Kotsopoulos J, Chen WY, Gates MA, et al.: Risk factors for ductal and lobular breast cancer: results from the nurses' health study. Breast Cancer Res 12 (6): R106, 2010.21143857
Goldacre MJ, Abisgold JD, Yeates DG, et al.: Benign breast disease and subsequent breast cancer: English record linkage studies. J Public Health (Oxf) 32 (4): 565-71, 2010.20154063
Kabat GC, Jones JG, Olson N, et al.: A multi-center prospective cohort study of benign breast disease and risk of subsequent breast cancer. Cancer Causes Control 21 (6): 821-8, 2010.20084540
Worsham MJ, Raju U, Lu M, et al.: Risk factors for breast cancer from benign breast disease in a diverse population. Breast Cancer Res Treat 118 (1): 1-7, 2009.18836828

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries with information related to breast cancer prevention include the following:

- Breast Cancer Screening
- Breast Cancer Treatment
- Male Breast Cancer Treatment
- Breast Cancer Treatment During Pregnancy
- Levels of Evidence for Cancer Screening and Prevention Studies

### Factors With Adequate Evidence of Increased Risk of Breast Cancer

#### Sex and age

Based on solid evidence, female sex and increasing age are the major risk factors for the development of breast cancer.

Magnitude of Effect: Women have a lifetime risk of developing breast cancer that is approximately 100 times the risk for men. The short-term risk of breast cancer in a 70-year-old woman is about ten times that of a 30-year-old woman.

- Study Design: Many epidemiological trials.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Inherited risk

Based on solid evidence, women who have a family history of breast cancer, especially in a first-degree relative, have an increased risk of breast cancer.

Magnitude of Effect: Risk is doubled if a single first-degree relative is affected; risk is increased fivefold if two first-degree relatives are diagnosed.

- Study Design: Population studies, cohort studies, and case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

Based on solid evidence, women who inherit gene mutations associated with breast cancer have an increased risk.

Magnitude of Effect: Variable, depending on gene mutation, family history, and other risk factors affecting gene expression.

- Study Design: Cohort or case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Breast density

Based on solid evidence, women with dense breasts have an increased risk of breast cancer. This is most often an inherent characteristic, to some extent modifiable by reproductive behavior, medications, and alcohol.[1]

Magnitude of Effect: Women with dense breasts have increased risk, proportionate to the degree of density. This increased relative risk (RR) ranges from 1.79 for women with slightly increased density to 4.64 for women with very dense breasts, compared with women who have the lowest breast density.[2]

- Study Design: Cohort, case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Modifiable Factors With Adequate Evidence of Increased Risk of Breast Cancer

#### Menopausal hormone therapy (MHT)

Based on solid evidence, MHT is associated with an increased risk of developing breast cancer, especially hormone-sensitive cancers. Estrogen-progesterone use significantly increases breast cancer risk starting with 1 to 4 years of usage and increases with duration of use. For estrogen use alone, the breast cancer risk is less but also significant. The excess risk persists after cessation of MHT.

- Study Design: Randomized controlled trials (RCTs), prospective studies and ecological observations.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Combination hormone therapy

Based on solid evidence, combination hormone therapy (estrogen-progestin) is associated with an increased risk of developing breast cancer.

Magnitude of Effect: Approximately a 26% increase in incidence of invasive breast cancer; the number needed to produce one excess breast cancer is 237.

- Study Design: RCTs and ecological observations. Furthermore, cohort and ecological studies show that cessation of combination HT is associated with a decrease in rates of breast cancer.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Estrogen therapy

Based on solid evidence, estrogen therapy that began close to the time of menopause is associated with an increased risk of breast cancer. Estrogen therapy that began at or after menopause is associated with an increased risk of endometrial cancer and total cardiovascular disease, especially stroke.

Magnitude of Effect: The increased incidence of breast cancer associated with estrogen therapy that began at the time of menopause ranged from 17% to 33%, depending on duration of use. Breast cancer incidence in women who have undergone hysterectomy is 23% lower if estrogen use began many years after menopause.[3] There is a 39% increase in stroke (RR, 1.12; 95% confidence interval [CI], 1.1–1.77) and a 12% increase in cardiovascular disease (RR, 1.12; 95% CI, 1.01–1.24).[3]

- Study Design: RCTs and ecological observations.
- Internal Validity: Good.
- Consistency: Good, although in women who have undergone hysterectomy, estrogen use that began many years after menopause was associated with a decrease in breast cancer incidence.
- External Validity: Good.

#### Ionizing radiation

Based on solid evidence, exposure of the breast to ionizing radiation is associated with an increased risk of developing breast cancer, starting 10 years after exposure and persisting lifelong. Risk depends on radiation dose and age at exposure, and is especially high if exposure occurs during puberty, when the breast develops.

Magnitude of Effect: Variable but approximately a sixfold increase overall.

- Study Design: Cohort or case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Obesity

Based on solid evidence, obesity is associated with an increased breast cancer risk in postmenopausal women who have not used HT. It is uncertain whether weight reduction decreases the risk of breast cancer in women with obesity.

Magnitude of Effect: The Women's Health Initiative observational study of 85,917 postmenopausal women found body weight to be associated with breast cancer. Comparing women weighing more than 82.2 kg with those weighing less than 58.7 kg, the RR was 2.85 (95% CI, 1.81–4.49).

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Alcohol

Based on solid evidence, alcohol consumption is associated with increased breast cancer risk in a dose-dependent fashion. It is uncertain whether decreasing alcohol intake by heavy drinkers reduces the risk.

Magnitude of Effect: The RR for women consuming approximately four alcoholic drinks per day compared with nondrinkers is 1.32 (95% CI, 1.19–1.45). The RR increases by 7% (95% CI, 5.5%–8.7%) for each drink per day.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Factors With Adequate Evidence of Decreased Risk of Breast Cancer

#### Early pregnancy

Based on solid evidence, women who have a full-term pregnancy before age 20 years have decreased breast cancer risk.

Magnitude of Effect: 50% decrease in breast cancer, compared with nulliparous women or women who give birth after age 35 years.

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Breast-feeding

Based on solid evidence, women who breast-feed have a decreased risk of breast cancer.

Magnitude of Effect: The RR of breast cancer is decreased 4.3% for every 12 months of breast-feeding, in addition to 7% for each birth.[4]

- Study Design: Case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Exercise

Based on solid evidence, physical exercise is associated with reduced breast cancer risk.

Magnitude of Effect: Average RR reduction association is 20% for both postmenopausal and premenopausal women and affects the risk of both hormone-sensitive and hormone-resistant cancers.

- Study Design: Prospective observational and retrospective studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Interventions With Adequate Evidence of Decreased Risk of Breast Cancer

#### Selective estrogen receptor modulators (SERMs): Benefits

Based on solid evidence, tamoxifen and raloxifene reduce the incidence of breast cancer in postmenopausal women, and tamoxifen reduces the risk of breast cancer in high-risk premenopausal women. The effects observed for tamoxifen and raloxifene persist several years after active treatment is discontinued, with longer duration of effect noted for tamoxifen than for raloxifene.[5]

All fractures were reduced by SERMs, primarily noted with raloxifene but not with tamoxifen. Reductions in vertebral fractures (34% reduction) and small reductions in nonvertebral fractures (7%) were noted.[5]

Magnitude of Effect: Tamoxifen reduced the incidence of estrogen receptor–positive (ER-positive) breast cancer and ductal carcinoma in situ (DCIS) in high-risk women by about 30% to 50% over 5 years of treatment. The reduction in ER-positive invasive breast cancer was maintained for at least 16 years after starting treatment (11 years after tamoxifen cessation). Breast cancer mortality was not affected.[6]

- Study Design: RCTs.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Selective estrogen receptor modulators: Harms

Based on solid evidence, tamoxifen increases the risk of endometrial cancer, thrombotic vascular events (i.e., pulmonary embolism, stroke, and deep venous thrombosis), and cataracts. The endometrial cancer risk persists for 5 years after tamoxifen cessation but not the risk of vascular events or cataracts. Based on solid evidence, raloxifene also increases venous pulmonary embolism and deep venous thrombosis but not endometrial cancer.

Magnitude of Effect: Meta-analysis showed RR of 2.4 (95% CI, 1.5–4.0) for endometrial cancer and 1.9 (95% CI, 1.4–2.6) for venous thromboembolic events. Meta-analysis showed the hazard ratio (HR) for endometrial cancer was 2.18 (95% CI, 1.39–3.42) for tamoxifen and 1.09 (95% CI, 0.74–1.62) for raloxifene. Overall, HR for venous thromboembolic events was 1.73 (95% CI, 1.47–2.05). Harms were significantly higher in women over 50 years than in younger women.

- Study Design: RCTs.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Aromatase inhibitors or inactivators: Benefits

Based on solid evidence, aromatase inhibitors or inactivators (AIs) reduce breast cancer incidence in postmenopausal women who have an increased risk.

Magnitude of Effect: In postmenopausal women treated with adjuvant tamoxifen for hormone-sensitive breast cancer, subsequent therapy with AIs reduced the incidence of new primary breast cancers by 50% to 67%, compared with controls. In postmenopausal women at high risk of developing breast cancer, 3 years of exemestane treatment reduced breast cancer incidence by 65%, compared with controls. A similar trial of 5 years of anastrozole treatment reduced breast cancer incidence by 53%, an effect persisting at 11 years.[7] After a median follow-up of 35 months, women aged 35 years and older who had at least one risk factor (age >60 years, a Gail 5-year risk >1.66%, or DCIS with mastectomy) and who took 25 mg of exemestane daily had a decreased risk of invasive breast cancer (HR, 0.35; 95% CI, 0.18–0.70) compared with controls. The absolute risk reduction was 21 cancers avoided out of 2,280 participants over 35 months. The number needed to treat was about 100.[8]

- Study Design: Multiple RCTs.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Aromatase inhibitors or inactivators: Harms

Based on fair evidence from a single RCT of 4,560 women over 35 months, exemestane is associated with hot flashes and fatigue compared with placebo.[8,9]

Magnitude of Effect: The absolute increase in hot flashes was 8% and the absolute increase in fatigue was 2%.

- Study Design: One RCT.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good for women who meet inclusion criteria.

#### Prophylactic mastectomy: Benefits

Based on solid evidence, bilateral prophylactic mastectomy reduces the risk of breast cancer in women with a strong family history, and most women experience relief from anxiety about breast cancer risk. Based on strong evidence, bilateral prophylactic mastectomy reduces the risk of breast cancer in women with a strong family history of breast cancer or other factors putting them at high risk (e.g., certain previous chest-wall radiation or previous personal history of breast cancer). Most women experience relief from anxiety about breast cancer risk after undergoing prophylactic mastectomy. Although some studies have suggested a survival benefit associated with contralateral prophylactic mastectomy, these results are generally attributed to selection bias, and there are no high-quality studies demonstrating a clear survival advantage. For more information, see Genetics of Breast and Gynecologic Cancers.

Magnitude of Effect: Breast cancer risk after bilateral prophylactic mastectomy in women at high risk may be reduced as much as 90%.

- Study Design: Evidence obtained from case-control and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Prophylactic oophorectomy or ovarian ablation: Benefits

Based on solid evidence, prophylactic oophorectomy in premenopausal women with a BRCA gene mutation is associated with decreased breast cancer incidence. Similar results are seen for oophorectomy or ovarian ablation in normal premenopausal women and in women with increased breast cancer risk resulting from thoracic irradiation.

Magnitude of Effect: Breast cancer incidence may be decreased by up to 50%.

- Study Design: Observational, case-control, and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Prophylactic oophorectomy or ovarian ablation: Harms

Based on solid evidence, castration may cause the abrupt onset of menopausal symptoms such as hot flashes, insomnia, anxiety, and depression. Long-term effects include decreased libido, vaginal dryness, and decreased bone mineral density.

Magnitude of Effect: Nearly all women experience some sleep disturbances, mood changes, hot flashes, and bone demineralization, but the severity of these symptoms varies greatly.

- Study Design: Observational, case-control, and cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Estrogen use by women with previous hysterectomy: Benefits

Based on fair evidence, women who have undergone a previous hysterectomy and who are treated with conjugated equine estrogen have a lower incidence of breast cancer.[3]

Magnitude of Effect: After 6.8 years, breast cancer incidence was 23% lower in women treated with estrogen in an RCT (0.27% per year, with a median of 5.9 years of use, compared with 0.35% per year among those taking a placebo). However, the risk was 30% higher in women treated with estrogen in an observational study. The difference in these results may be explained by different screening behaviors of the women in these studies.

- Study Design: One RCT, observational studies.
- Internal Validity: Fair.
- Consistency: Poor.
- External Validity: Poor.

### References

Boyd NF, Martin LJ, Rommens JM, et al.: Mammographic density: a heritable risk factor for breast cancer. Methods Mol Biol 472: 343-60, 2009.19107441
McCormack VA, dos Santos Silva I: Breast density and parenchymal patterns as markers of breast cancer risk: a meta-analysis. Cancer Epidemiol Biomarkers Prev 15 (6): 1159-69, 2006.16775176
Anderson GL, Limacher M, Assaf AR, et al.: Effects of conjugated equine estrogen in postmenopausal women with hysterectomy: the Women's Health Initiative randomized controlled trial. JAMA 291 (14): 1701-12, 2004.15082697
Col: Breast cancer and breastfeeding: collaborative reanalysis of individual data from 47 epidemiological studies in 30 countries, including 50302 women with breast cancer and 96973 women without the disease. Lancet 360 (9328): 187-95, 2002.12133652 22129315
Cuzick J, Sestak I, Bonanni B, et al.: Selective oestrogen receptor modulators in prevention of breast cancer: an updated meta-analysis of individual participant data. Lancet 381 (9880): 1827-34, 2013.23639488
Cuzick J, Sestak I, Cawthorn S, et al.: Tamoxifen for prevention of breast cancer: extended long-term follow-up of the IBIS-I breast cancer prevention trial. Lancet Oncol 16 (1): 67-75, 2015.25497694
Batur P: In high-risk, postmenopausal women, 5 years of anastrozole reduced breast cancer incidence at 11 years. Ann Intern Med 172 (8): JC45, 2020.32311729
Goss PE, Ingle JN, Alés-Martínez JE, et al.: Exemestane for breast-cancer prevention in postmenopausal women. N Engl J Med 364 (25): 2381-91, 2011.21639806
Maunsell E, Goss PE, Chlebowski RT, et al.: Quality of life in MAP.3 (Mammary Prevention 3): a randomized, placebo-controlled trial evaluating exemestane for prevention of breast cancer. J Clin Oncol 32 (14): 1427-36, 2014.24711552

## Incidence and Mortality

Breast cancer is the most frequently diagnosed nonskin malignancy in U.S. women and is second only to lung cancer in cancer deaths in women.[1] Estimates for the U.S. population in 2025 are that 316,950 women will be diagnosed with breast cancer, with 42,170 deaths from this disease, and 2,800 men will be diagnosed with breast cancer, with 510 deaths from this disease.[1] Breast cancer incidence in women had been gradually increasing for many years until the early 2000s, when it decreased rapidly, coincident with a drop in postmenopausal hormone therapy use. However, since the initial decrease between 2000 and 2005, there has been a small but steady increase in incidence, approaching incidence rates seen before that decrease.[2]

According to data from the Surveillance, Epidemiology, and End Results (SEER) Program, breast cancer mortality rates declined by 44% from 1989 to 2022. However, mortality rates in Black women remain about 38% higher than in White women.[1] Incidence rates are now similar between Black and White women.

The major risk factor for breast cancer is advancing age. A 30-year-old woman has about a 1 in 175 chance of being diagnosed with breast cancer in the next 10 years, whereas a 70-year-old woman has a 1 in 9 chance over the same time period.[2]

Screening by mammography decreases breast cancer mortality by identifying cases for treatment at an earlier stage. However, screening also identifies more cases than would become symptomatic in a woman’s lifetime, so screening increases breast cancer incidence. For more information, see the Overdiagnosis section in Breast Cancer Screening.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.

## Etiology and Pathogenesis of Breast Cancer

Breast cancer develops when a series of genetic mutations occurs.[1] Some cancer-associated mutations are inherited, but most are somatic mutations that occur as random events during a woman’s lifetime. Initially, mutations do not change the histological appearance of the tissue, but accumulated mutations will result in hyperplasia, dysplasia, carcinoma in situ, and eventually, invasive cancer.[2] The longer a woman lives, the more somatic mutations occur, and the more likely it is that these mutations will produce populations of cells that may eventually become malignancies. Estrogen and progestin hormones, whether endogenous or exogenous, stimulate growth and proliferation of breast cells, perhaps via growth factors such as transforming growth factor-alpha.[3] The stimulation by these hormones can promote the development and proliferation of breast cancer cells.

International variation in breast cancer rates may be explained by differences in genetics, reproductive factors, diet, exercise, and screening behavior. The relative importance of these factors was demonstrated in a study of breast cancer incidence of Japanese immigrants to the United States. Whereas Japanese women in Japan had a low breast cancer incidence, Japanese women in the United States had a much higher breast cancer incidence, similar to that of American women, within two generations of migration.[4-6]

### References

Boone CW, Kelloff GJ, Freedman LS: Intraepithelial and postinvasive neoplasia as a stochastic continuum of clonal evolution, and its relationship to mechanisms of chemopreventive drug action. J Cell Biochem Suppl 17G: 14-25, 1993.8007692 94276605
Kelloff GJ, Boone CW, Steele VE, et al.: Progress in cancer chemoprevention: perspectives on agent selection and short-term clinical intervention trials. Cancer Res 54 (7 Suppl): 2015s-2024s, 1994.8137331 94185065
Knabbe C, Lippman ME, Wakefield LM, et al.: Evidence that transforming growth factor-beta is a hormonally regulated negative growth factor in human breast cancer cells. Cell 48 (3): 417-28, 1987.2879636 87102891
Parkin DM: Cancers of the breast, endometrium and ovary: geographic correlations. Eur J Cancer Clin Oncol 25 (12): 1917-25, 1989.2698807 90214689
Dunn JE: Breast cancer among American Japanese in the San Francisco Bay area. Natl Cancer Inst Monogr 47: 157-60, 1977.613235 78177178
Kliewer EV, Smith KR: Breast cancer mortality among immigrants in Australia and Canada. J Natl Cancer Inst 87 (15): 1154-61, 1995.7674320 95404633

## Endogenous Estrogen

Endogenous estrogen plays a role in the development of breast cancer. Women whose menarche occurred at or before age 11 years have about a 20% greater chance of developing breast cancer than do women whose menarche occurred at or after age 14 years.[1-3] Women who experience late menopause also have an increased risk. Women who develop breast cancer tend to have higher endogenous estrogen and androgen levels.[3-7]

Conversely, women who experience premature menopause have a lower risk of breast cancer. Following ovarian ablation, breast cancer risk may be reduced as much as 75% depending on age, weight, and parity, with the greatest reduction for young, thin, nulliparous women.[8-11] The removal of one ovary also reduces the risk of breast cancer but to a lesser degree.[12]

Other hormonal changes also influence breast cancer risk. For more information, see the sections on Early Pregnancy and Breast-feeding in the Factors With Adequate Evidence of Decreased Risk of Breast Cancer section.

The interaction of endogenous estrogen levels, insulin levels, and obesity—all of which affect breast cancer risk—are poorly understood but suggest strategies for interventions to decrease that risk. It is likely that reproductive risk factors interact with predisposing genotypes. For example, in the Nurses’ Health Study,[13] the associations between age at first birth, menarche, and menopause and the development of breast cancer were observed only among women without a family history of breast cancer in a mother or sister.

### References

Brinton LA, Schairer C, Hoover RN, et al.: Menstrual factors and risk of breast cancer. Cancer Invest 6 (3): 245-54, 1988.3167610 89002187
Collaborative Group on Hormonal Factors in Breast Cancer: Menarche, menopause, and breast cancer risk: individual participant meta-analysis, including 118 964 women with breast cancer from 117 epidemiological studies. Lancet Oncol 13 (11): 1141-51, 2012.23084519
Ritte R, Lukanova A, Tjønneland A, et al.: Height, age at menarche and risk of hormone receptor-positive and -negative breast cancer: a cohort study. Int J Cancer 132 (11): 2619-29, 2013.23090881
Endogenous Hormones and Breast Cancer Collaborative Group: Endogenous sex hormones and breast cancer in postmenopausal women: reanalysis of nine prospective studies. J Natl Cancer Inst 94 (8): 606-16, 2002.11959894 21956821
Key TJ, Appleby PN, Reeves GK, et al.: Circulating sex hormones and breast cancer risk factors in postmenopausal women: reanalysis of 13 studies. Br J Cancer 105 (5): 709-22, 2011.21772329
Kaaks R, Rinaldi S, Key TJ, et al.: Postmenopausal serum androgens, oestrogens and breast cancer risk: the European prospective investigation into cancer and nutrition. Endocr Relat Cancer 12 (4): 1071-82, 2005.16322344
Kaaks R, Berrino F, Key T, et al.: Serum sex steroids in premenopausal women and breast cancer risk within the European Prospective Investigation into Cancer and Nutrition (EPIC). J Natl Cancer Inst 97 (10): 755-65, 2005.15900045
Smith PG, Doll R: Late effects of x irradiation in patients treated for metropathia haemorrhagica. Br J Radiol 49 (579): 224-32, 1976.1276589 76207166
Trichopoulos D, MacMahon B, Cole P: Menopause and breast cancer risk. J Natl Cancer Inst 48 (3): 605-13, 1972.5058966 72107621
Feinleib M: Breast cancer and artificial menopause: a cohort study. J Natl Cancer Inst 41 (2): 315-29, 1968.5671283 68393154
Kampert JB, Whittemore AS, Paffenbarger RS: Combined effect of childbearing, menstrual events, and body size on age-specific breast cancer risk. Am J Epidemiol 128 (5): 962-79, 1988.3189296 89047366
Hirayama T, Wynder EL: A study of the epidemiology of cancer of the breast. II. The influence of hysterectomy. Cancer 15: 28-38, 1962 Jan-Feb.13907646
Colditz GA, Kaphingst KA, Hankinson SE, et al.: Family history and risk of breast cancer: nurses' health study. Breast Cancer Res Treat 133 (3): 1097-104, 2012.22350789

## Inherited Risk

Breast cancer risk increases in women with a positive family history, particularly if first-degree relatives are affected.[1] The following risk assessment models, derived from databases, cohort, and case-control studies, quantitate this risk:

- Breast Cancer Risk Assessment Tool [Gail Model] (https://bcrisktool.cancer.gov).
- Breast Cancer Surveillance Consortium [BCSC] Risk Calculator (https://tools.bcsc-scc.org/BC5yearRisk/intro.htm).
- Breast Cancer Referral Screening Tool [B-RST] (https://www.breastcancergenescreen.org/).
- Hall Detailed Breast Risk Calculator (http://halls.md/breast/risk.htm).
- IBIS Breast Cancer Risk Calculator Tool (http://www.ems-trials.org/riskevaluator/).

Specific abnormal alleles are associated with approximately 5% of breast cancers. For more information, see Genetics of Breast and Gynecologic Cancers. Mutations in BRCA genes are inherited in an autosomal dominant fashion and are highly penetrant in causing cancer, often at a younger age.[2-4] Family history and mutation location within the BRCA1 or BRCA2 gene may contribute to the risk of cancer development among those with an inherited predisposition to breast cancer.[5] The lifetime risk of breast cancer is 55% to 65% for BRCA1 mutation carriers and 45% to 47% for BRCA2 mutation carriers.[6,7] In comparison, the lifetime risk of breast cancer is 13% in the general population.[8]

Some women inherit a susceptibility to mutagens or growth factors, which increase breast cancer risk.[9,10] For more information, see the Ionizing Radiation Exposure section.

### References

Colditz GA, Kaphingst KA, Hankinson SE, et al.: Family history and risk of breast cancer: nurses' health study. Breast Cancer Res Treat 133 (3): 1097-104, 2012.22350789
Miki Y, Swensen J, Shattuck-Eidens D, et al.: A strong candidate for the breast and ovarian cancer susceptibility gene BRCA1. Science 266 (5182): 66-71, 1994.7545954 95025896
Futreal PA, Liu Q, Shattuck-Eidens D, et al.: BRCA1 mutations in primary breast and ovarian carcinomas. Science 266 (5182): 120-2, 1994.7939630 95025878
Wooster R, Neuhausen SL, Mangion J, et al.: Localization of a breast cancer susceptibility gene, BRCA2, to chromosome 13q12-13. Science 265 (5181): 2088-90, 1994.8091231 94378006
Kuchenbaecker KB, Hopper JL, Barnes DR, et al.: Risks of Breast, Ovarian, and Contralateral Breast Cancer for BRCA1 and BRCA2 Mutation Carriers. JAMA 317 (23): 2402-2416, 2017.28632866
Antoniou A, Pharoah PD, Narod S, et al.: Average risks of breast and ovarian cancer associated with BRCA1 or BRCA2 mutations detected in case Series unselected for family history: a combined analysis of 22 studies. Am J Hum Genet 72 (5): 1117-30, 2003.12677558 22589965
Chen S, Parmigiani G: Meta-analysis of BRCA1 and BRCA2 penetrance. J Clin Oncol 25 (11): 1329-33, 2007.17416853
National Cancer Institute: SEER Cancer Stat Facts: Female Breast Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/breast.html). Last accessed April 9, 2025.
Swift M, Morrell D, Massey RB, et al.: Incidence of cancer in 161 families affected by ataxia-telangiectasia. N Engl J Med 325 (26): 1831-6, 1991.1961222 92072632
Cybulski C, Wokołorczyk D, Jakubowska A, et al.: Risk of breast cancer in women with a CHEK2 mutation with and without a family history of breast cancer. J Clin Oncol 29 (28): 3747-52, 2011.21876083

## Increased Breast Density

Widespread use of screening mammograms has demonstrated great variability in breast tissue density. Women with a greater proportion of dense tissue have a higher incidence of breast cancer. Mammographic density also confounds the identification of cancers by mammograms. The extent of increased risk was described in a report of three nested case-control studies in screened populations with 1,112 matched case-control pairs. Compared with women with density comprising less than 10% of breast tissue, women with density in 75% or more of their breast had an increased risk of breast cancer (odds ratio [OR], 4.7; 95% confidence interval [CI], 3.0–7.4), whether the cancer was detected by screening (OR, 3.5; 95% CI, 2.0–6.2) or detected less than 12 months after a negative screening examination (OR, 17.8; 95% CI, 4.8–65.9). Increased risk of breast cancer, whether detected by screening or other means, persisted for at least 8 years after study entry and was greater in younger women than in older women. For women younger than the median age of 56 years, 26% of all breast cancers and 50% of cancers detected less than 12 months after a negative screening test were identified in women with mammographic breast density of 50% or more.[1,2]

Compared with women who have the lowest breast density, women with dense breasts have increased risk, proportionate to the degree of density. This increased relative risk ranges from 1.79 for women with slightly increased breast density to 4.64 for women with very dense breasts.[3] There is no increased risk of breast cancer mortality among women with dense breast tissue.[4]

### References

Boyd NF, Guo H, Martin LJ, et al.: Mammographic density and the risk and detection of breast cancer. N Engl J Med 356 (3): 227-36, 2007.17229950
Razzaghi H, Troester MA, Gierach GL, et al.: Mammographic density and breast cancer risk in White and African American Women. Breast Cancer Res Treat 135 (2): 571-80, 2012.22864770
McCormack VA, dos Santos Silva I: Breast density and parenchymal patterns as markers of breast cancer risk: a meta-analysis. Cancer Epidemiol Biomarkers Prev 15 (6): 1159-69, 2006.16775176
Gierach GL, Ichikawa L, Kerlikowske K, et al.: Relationship between mammographic density and breast cancer death in the Breast Cancer Surveillance Consortium. J Natl Cancer Inst 104 (16): 1218-27, 2012.22911616

## Factors With Adequate Evidence of Increased Risk of Breast Cancer

### Menopausal Hormone Therapy (MHT)

MHT has been used to alleviate hot flashes and other symptoms associated with menopause. Single-agent estrogen is associated with an increased incidence of uterine cancer, but estrogen-progesterone use is not. Women with intact uteri are prescribed the combination, with oral progesterone given continuously or intermittently, or intrauterine progesterone delivered locally by intrauterine device (IUD). Estrogen therapy that began close to the time of menopause is associated with an increased risk of developing breast cancer. Estrogen therapy that began at or after menopause is associated with an increased risk of developing endometrial cancer and total cardiovascular disease, especially stroke.[1] Women who have undergone hysterectomy often take unopposed estrogen.

In 1997, 51 epidemiological studies were reanalyzed, encompassing more than 150,000 women, and it was found that MHT was associated with increased breast cancer risk.[2]

The Heart and Estrogen/Progestin Replacement Study, published in 2002, extended these findings by randomly assigning 2,763 women, with coronary heart disease (median age, 67), to receive either estrogen-progestin or placebo.[3] At 6.8 years of follow-up, breast cancer incidence was higher for hormone users (relative risk [RR], 1.27; 95% confidence interval [CI], 0.84–1.94).

The Women’s Health Initiative (WHI), also published in 2002, randomly assigned over 16,000 women aged 50 to 79 years with intact uteri to receive either estrogen-progesterone or placebo.[4] The WHI was terminated early because the risk for coronary heart disease was unchanged, but the risk for stroke was increased with MHT. The incidence of invasive breast cancer was also increased in women who had taken MHT (hazard ratio, 1.24; 95% CI, 10.2–1.50). In addition to the randomized trial, the WHI conducted an observational study that examined women aged 50 to 79 years and found an increased risk of breast cancer, especially for those starting MHT at menopause. The WHI also randomly assigned 10,739 women who had undergone hysterectomy and were aged 50 to 79 years to receive either estrogen or placebo. Estrogen use was associated with an increased risk of stroke, so the trial was stopped early. After the publication of the WHI results, MHT use dropped worldwide, and breast cancer risk declined in countries where MHT usage had been high.

In 2003, the Cancer Surveillance System of Puget Sound reported results of a population-based survey of 965 women with breast cancer and 1,007 controls.[5] This study showed a 1.7-fold increased risk of invasive breast cancer with estrogen-progesterone use, but not with estrogen use alone.

While the association between estrogen-progesterone MHT and breast cancer risk was consistently observed, questions arose about the use of estrogen-only in women who had undergone hysterectomy, especially about the timing of therapy in relation to menopause and the participation in screening activities by MHT users.

The United Kingdom Million Women Study [6] recruited 1,084,110 women aged 50 to 64 years between 1996 and 2001. This study obtained information about MHT use, along with other health information, and followed them for breast cancer incidence and death. One-half of the women had used MHT. At 2.6 years of follow up, there were 9,364 invasive breast cancers, and at 4.1 years, there were 637 breast cancer deaths. At recruitment, current MHT users were more likely than were never-users to develop breast cancer (adjusted RR, 1.66; 95% CI, 1.58–1.75; P < .0001) and to die from the disease (adjusted RR, 1.22; 95% CI, 1.00–1.48; P = .05). Past MHT users had no increased risk of incident breast cancer (odds ratio [OR], 1.01; 95% CI, 0.94–1.09) or fatal breast cancer (OR, 1.05; 95% CI, 0.82–1.34). Incidence was increased for current users of estrogen (RR, 1.30; 95% CI, 1.21–1.40; P < .0001), combined MHT (RR, 2.00; 95% CI, 1.88–2.12; P < .0001), and tibolone (RR, 1.45; 95% CI, 1.25–1.68; P < .0001). The magnitude of the associated risk was greater for combined MHT than for other types of MHT (P < .0001). Tibolone is approved for use to manage menopausal symptoms or to prevent osteoporosis in many countries. However, it is not approved for use in Canada or the United States.

A population-based survey of 965 women with breast cancer and 1,007 controls was conducted by the Cancer Surveillance System of Puget Sound. It showed that combined MHT users had a 1.7-fold increased risk of invasive breast cancer, whereas estrogen-only users did not.[5]

In 2019, the Collaborative Group on Hormonal Factors in Breast Cancer reported results of a meta-analysis of 24 prospective and 34 retrospective studies of MHT and breast cancer risk, encompassing 143,887 women who developed breast cancer and 424,972 controls. Overall, MHT users had higher breast cancer risk, especially for hormone-sensitive tumors.[7]

Table 1. Breast Cancer Risk Among Menopausal Hormone Therapy Users^a^

| Years 1–4 of Use | Years 5–14 of Use
Estrogen-progesterone | RR, 1.60 (95% CI, 1.52–1.62) | RR, 2.08 (95% CI, 2.02–2.15)
Estrogen-only | RR, 1.17 (95% CI, 1.10–1.26) | RR, 1.33 (95% CI, 1.28–1.37)

CI = confidence interval; RR = relative risk.

^a^ [7]

The associations between MHT and breast cancer were weaker for women starting MHT after age 60 years and for women with obesity. Women with obesity had minimal risk from estrogen MHT that began after age 60 years. In summary, women of average weight who used 5 years of MHT starting at 50 years have an increased risk of breast cancer incidence of 1 in 50 users for estrogen-progesterone, 1 in 70 users for estrogen plus intermittent progesterone, and 1 in 200 users for estrogen-only products.

This meta-analysis, confirming and expanding the understanding of estrogen-progesterone risk of breast cancer, also resolves the question of estrogen use in women who have undergone hysterectomy. If the estrogen use began at menopause, it is associated with an increase in breast cancer risk, but not if it began many years later. These findings, as well as the documented increase in stroke risk with estrogen therapy, should be considered when reviewing options to treat.

In 2022, an evidence review concluded that the use of combined estrogen and progestin for the primary prevention of chronic disease (i.e., cardiovascular disease, cancer, osteoporosis, and fracture) in postmenopausal women with an intact uterus was associated with some benefits. However, this combination therapy was also associated with an increased risk of harms. Therefore, it has no net benefit. Moreover, the systematic review concluded with moderate certainty that the use of estrogen alone for the primary prevention of chronic diseases in postmenopausal women who had a hysterectomy also has no net benefit.[8]

### Ionizing Radiation Exposure

A well-established relationship exists between exposure to ionizing radiation and subsequent breast cancer.[9] Excess breast cancer risk has been observed in association with atomic bomb exposure, frequent fluoroscopy for tuberculosis, and radiation therapy for acne, tinea, thymic enlargement, postpartum mastitis, and lymphoma. Risk is higher for the young, especially around puberty. An estimate of the risk of breast cancer associated with medical radiology puts the figure at less than 1% of all breast cancer cases.[10] However, it has been theorized that certain populations, such as AT heterozygotes, are at an increased risk of breast cancer from radiation exposure.[11] A large cohort study of women who carry mutations of BRCA1 or BRCA2 concluded that chest x-rays, especially before age 20 years increased their risk of breast cancer beyond already increased levels (RR, 1.54; 95% CI, 1.1–2.1).[12]

Women treated for Hodgkin lymphoma with mantle radiation by age 16 years have a subsequent risk up to 35% of developing breast cancer by age 40 years.[13-15] Higher radiation doses (median dose, 40 Gy in breast cancer cases) and treatment between the ages of 10 and 16 years are associated with higher risk.[13] Unlike the risk for secondary leukemia, the risk of treatment-related breast cancer does not abate with duration of follow-up, persisting more than 25 years after treatment.[13,15,16] In these studies, most patients (85%–100%) who developed breast cancer did so either within the field of radiation or at the margin.[13,14,16] A Dutch study examined 48 women who developed breast cancer at least 5 years after treatment for Hodgkin disease and compared them with 175 matched female Hodgkin disease patients who did not develop breast cancer. Patients treated with chemotherapy and mantle radiation were less likely to develop breast cancer than were those treated with mantle radiation alone, possibly because of chemotherapy-induced ovarian suppression (RR, 0.06; 95% CI, 0.01–0.45).[17] Another study of 105 radiation-associated breast cancer patients and 266 age-matched and radiation-matched controls showed a similar protective effect for ovarian radiation.[15] These studies suggest that reduction of ovarian hormones limits the proliferation of breast tissue with radiation-induced mutations.[15]

The question arises whether breast cancer patients treated with lumpectomy and radiation therapy (L-RT) are at higher risk for second breast malignancies or other malignancies than are those treated by mastectomy. Outcomes of 1,029 L-RT patients were compared with outcomes of 1,387 patients who underwent mastectomies. After a median follow-up of 15 years, there was no difference in the risk of second malignancies.[18] Further evidence from three RCTs is also reassuring. One report of 1,851 women randomly assigned to undergo total mastectomy, lumpectomy alone, or L-RT showed rates of contralateral breast cancer to be 8.5%, 8.8%, and 9.4%, respectively.[19] Another study of 701 women randomly assigned to undergo radical mastectomy or breast-conserving surgery followed by radiation therapy demonstrated the rate of contralateral breast carcinomas per 100 woman-years to be 10.2 versus 8.7, respectively.[20] The third study compared 25-year outcomes of 1,665 women randomly assigned to undergo radical mastectomy, total mastectomy, or total mastectomy with radiation. There was no significant difference in the rate of contralateral breast cancer according to treatment group, and the overall rate was 6%.[21]

### Obesity

Obesity is associated with increased breast cancer risk, especially among postmenopausal women who do not use hormone therapy (HT). The WHI observed 85,917 women aged 50 to 79 years and collected information on weight history and known risk factors for breast cancer.[22,23] Height, weight, and waist and hip circumferences were measured. With a median follow-up of 34.8 months, 1,030 of the women developed invasive breast cancer. Among the women who never used HT, increased breast cancer risk was associated with weight at entry, body mass index (BMI) at entry, BMI at age 50 years, maximum BMI, adult and postmenopausal weight change, and waist and hip circumferences. Weight was the strongest predictor, with a RR of 2.85 (95% CI, 1.81–4.49) for women weighing more than 82.2 kg, compared with those weighing less than 58.7 kg.

The association between obesity, diabetes, and insulin levels with breast cancer risk have been studied but not clearly defined. The British Women’s Heart and Health Study of women aged 60 to 79 years compared 151 women who had a diagnosis of breast cancer with 3,690 women who did not. The age-adjusted OR was 1.34 (95% CI, 1.02–1.77) for each unit increase in log(e) insulin level among nondiabetic women. The association was observed, after adjustment for confounders and for potential mediating factors, for both pre- and postmenopausal breast cancers. In addition, fasting glucose level, homeostatic model assessment score (the product of fasting glucose and insulin levels divided by 22.5), diabetes, and a history of gestational glycosuria or diabetes were also associated with breast cancer.[24]

### Alcohol

Alcohol consumption increases the risk of breast cancer. A British meta-analysis included individual data from 53 case-control and cohort studies.[25] Compared with the RR of breast cancer for women who reported no alcohol consumption, the RR of breast cancer was 1.32 (95% CI, 1.19–1.45; P < .001) for women consuming 35 g to 44 g of alcohol per day and 1.46 (95% CI, 1.33–1.61; P < .001) for those consuming at least 45 g of alcohol per day. The RR of breast cancer increases by about 7% (95% CI, 5.5%–8.7%; P < .001) for each 10 g of alcohol (i.e., one drink) consumed per day. These findings persist after stratification for race, education, family history, age at menarche, height, weight, BMI, breast-feeding, oral contraceptive use, menopausal hormone use and type, and age at menopause.

### References

Cuzick J, Sestak I, Forbes JF, et al.: Use of anastrozole for breast cancer prevention (IBIS-II): long-term results of a randomised controlled trial. Lancet 395 (10218): 117-122, 2020.31839281
Breast cancer and hormone replacement therapy: collaborative reanalysis of data from 51 epidemiological studies of 52,705 women with breast cancer and 108,411 women without breast cancer. Collaborative Group on Hormonal Factors in Breast Cancer. Lancet 350 (9084): 1047-59, 1997.10213546 99228560
Hulley S, Furberg C, Barrett-Connor E, et al.: Noncardiovascular disease outcomes during 6.8 years of hormone therapy: Heart and Estrogen/progestin Replacement Study follow-up (HERS II). JAMA 288 (1): 58-66, 2002.12090863
Writing Group for the Women's Health Initiative Investigators: Risks and benefits of estrogen plus progestin in healthy postmenopausal women: principal results From the Women's Health Initiative randomized controlled trial. JAMA 288 (3): 321-33, 2002.12117397 22113237
Li CI, Malone KE, Porter PL, et al.: Relationship between long durations and different regimens of hormone therapy and risk of breast cancer. JAMA 289 (24): 3254-63, 2003.12824206 22708576
Beral V, Reeves G, Bull D, et al.: Breast cancer risk in relation to the interval between menopause and starting hormone therapy. J Natl Cancer Inst 103 (4): 296-305, 2011.21278356
Collaborative Group on Hormonal Factors in Breast Cancer: Type and timing of menopausal hormone therapy and breast cancer risk: individual participant meta-analysis of the worldwide epidemiological evidence. Lancet 394 (10204): 1159-1168, 2019.31474332
Gartlehner G, Patel SV, Reddy S, et al.: Hormone Therapy for the Primary Prevention of Chronic Conditions in Postmenopausal Persons: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 328 (17): 1747-1765, 2022.36318128
John EM, Kelsey JL: Radiation and other environmental exposures and breast cancer. Epidemiol Rev 15 (1): 157-62, 1993.8405198 94009400
Evans JS, Wennberg JE, McNeil BJ: The influence of diagnostic radiography on the incidence of breast cancer and leukemia. N Engl J Med 315 (13): 810-5, 1986.3748092 86311126
Swift M, Morrell D, Massey RB, et al.: Incidence of cancer in 161 families affected by ataxia-telangiectasia. N Engl J Med 325 (26): 1831-6, 1991.1961222 92072632
Andrieu N, Easton DF, Chang-Claude J, et al.: Effect of chest X-rays on the risk of breast cancer among BRCA1/2 mutation carriers in the international BRCA1/2 carrier cohort study: a report from the EMBRACE, GENEPSO, GEO-HEBON, and IBCCS Collaborators' Group. J Clin Oncol 24 (21): 3361-6, 2006.16801631
Bhatia S, Robison LL, Oberlin O, et al.: Breast cancer and other second neoplasms after childhood Hodgkin's disease. N Engl J Med 334 (12): 745-51, 1996.8592547 96172864
Hancock SL, Tucker MA, Hoppe RT: Breast cancer after treatment of Hodgkin's disease. J Natl Cancer Inst 85 (1): 25-31, 1993.8416252 93095141
Travis LB, Hill DA, Dores GM, et al.: Breast cancer following radiotherapy and chemotherapy among young women with Hodgkin disease. JAMA 290 (4): 465-75, 2003.12876089
Sankila R, Garwicz S, Olsen JH, et al.: Risk of subsequent malignant neoplasms among 1,641 Hodgkin's disease patients diagnosed in childhood and adolescence: a population-based cohort study in the five Nordic countries. Association of the Nordic Cancer Registries and the Nordic Society of Pediatric Hematology and Oncology. J Clin Oncol 14 (5): 1442-6, 1996.8622057 96208818
van Leeuwen FE, Klokman WJ, Stovall M, et al.: Roles of radiation dose, chemotherapy, and hormonal factors in breast cancer following Hodgkin's disease. J Natl Cancer Inst 95 (13): 971-80, 2003.12837833
Obedian E, Fischer DB, Haffty BG: Second malignancies after treatment of early-stage breast cancer: lumpectomy and radiation therapy versus mastectomy. J Clin Oncol 18 (12): 2406-12, 2000.10856100 20314658
Fisher B, Anderson S, Bryant J, et al.: Twenty-year follow-up of a randomized trial comparing total mastectomy, lumpectomy, and lumpectomy plus irradiation for the treatment of invasive breast cancer. N Engl J Med 347 (16): 1233-41, 2002.12393820 22282026
Veronesi U, Cascinelli N, Mariani L, et al.: Twenty-year follow-up of a randomized study comparing breast-conserving surgery with radical mastectomy for early breast cancer. N Engl J Med 347 (16): 1227-32, 2002.12393819 22282025
Fisher B, Jeong JH, Anderson S, et al.: Twenty-five-year follow-up of a randomized trial comparing radical mastectomy, total mastectomy, and total mastectomy followed by irradiation. N Engl J Med 347 (8): 567-75, 2002.12192016 22179757
Morimoto LM, White E, Chen Z, et al.: Obesity, body size, and risk of postmenopausal breast cancer: the Women's Health Initiative (United States). Cancer Causes Control 13 (8): 741-51, 2002.12420953 22308039
Wolin KY, Carson K, Colditz GA: Obesity and cancer. Oncologist 15 (6): 556-65, 2010.20507889
Lawlor DA, Smith GD, Ebrahim S: Hyperinsulinaemia and increased risk of breast cancer: findings from the British Women's Heart and Health Study. Cancer Causes Control 15 (3): 267-75, 2004.15090721
Hamajima N, Hirose K, Tajima K, et al.: Alcohol, tobacco and breast cancer--collaborative reanalysis of individual data from 53 epidemiological studies, including 58,515 women with breast cancer and 95,067 women without the disease. Br J Cancer 87 (11): 1234-45, 2002.12439712 22325580

## Factors With Adequate Evidence of Decreased Risk of Breast Cancer

### Early Pregnancy

Childbirth is followed by an increase in risk of breast cancer for several years, and then a long-term reduction in risk, which is greater for younger women.[1-3] In one study, women who experienced a first full-term pregnancy before age 20 years were half as likely to develop breast cancer as nulliparous women or women whose first full-term pregnancy occurred at age 35 years or older.[4,5]

The effect of childbirth on breast cancer risk was demonstrated by the International Premenopausal Breast Cancer Collaborative Group, which undertook a pooled analysis of individual-level data from about 890,000 women from 15 prospective cohort studies. When compared with nulliparous women, parous women had an increased risk of developing both estrogen receptor–positive (ER–positive) and estrogen receptor–negative (ER–negative) breast cancer for up to 20 years after childbirth. However, after about 24 years, the risk of developing ER–positive breast cancer decreased, but the risk of developing ER–negative breast cancer remained elevated. Thus, the association between parity and breast cancer risk is complex and appears to be influenced by the time period after childbirth, as well as tumor phenotype.[6]

### Breast-feeding

Breast-feeding is associated with a decreased risk of breast cancer.[7] A reanalysis of individual data from 47 epidemiological studies in 30 countries of 50,302 women with breast cancer and 96,973 controls revealed that breast cancer incidence was lower in parous women who had ever breast-fed than in parous women who had not. It was also proportionate to duration of breast-feeding.[8] The relative risk (RR) of breast cancer decreased by 4.3% (95%, confidence interval [CI], 2.9%–5.8%; P < .0001) for every 12 months of breast-feeding in addition to a decrease of 7.0% (95% CI, 5.0%–9.0%; P < .0001) for each birth.

### Exercise

Many studies have shown an associated benefit between physical exercise and breast cancer risk. A French study of 59,308 women, averaging 8.5 years postmenopause, found that recreational activity greater than 12 metabolic equivalent task (MET) h/wk was associated with decreased risk of invasive breast cancer (hazard ratio [HR], 0.9; 95% CI, 0.83–0.99).[9] The Nurses' Health Study included 95,396 postmenopausal women and found that women who exercised more than 27 MET h/wk (equivalent to 1 h/d of brisk walking) had decreased breast cancer incidence compared with those who had fewer than 3 MET h/wk (HR, 0.85; 95% CI, 0.78–0.93; P < .001 for trend). There was no difference in the association between exercise and breast cancer risk for hormone-positive or hormone-negative cancers.[10] Two meta-analyses yielded the same conclusions. One meta-analysis included 38 prospective trials performed from 1987 to 2014. The summary RR was 0.88 (95% CI, 0.85–0.90); results were similar for hormone-positive or hormone-negative cancers.[11] Another meta-analysis reviewed 139 studies encompassing 236,955 women with 3,963 controls. Women who exercised had a significant decrease in breast cancer (odds ratio, 0.78; 95% CI, 0.76–0.81), with a similar effect size for premenopausal and postmenopausal women.[12]

### References

Kampert JB, Whittemore AS, Paffenbarger RS: Combined effect of childbearing, menstrual events, and body size on age-specific breast cancer risk. Am J Epidemiol 128 (5): 962-79, 1988.3189296 89047366
Pike MC, Krailo MD, Henderson BE, et al.: 'Hormonal' risk factors, 'breast tissue age' and the age-incidence of breast cancer. Nature 303 (5920): 767-70, 1983.6866078 83244959
Lambe M, Hsieh C, Trichopoulos D, et al.: Transient increase in the risk of breast cancer after giving birth. N Engl J Med 331 (1): 5-9, 1994.8202106 94261144
Henderson BE, Pike MC, Ross RK, et al.: Epidemiology and risk factors. In: Bonadonna G, ed.: Breast Cancer: Diagnosis and Management. John Wiley & Sons, 1984, pp 15-33.
Gail MH, Brinton LA, Byar DP, et al.: Projecting individualized probabilities of developing breast cancer for white females who are being examined annually. J Natl Cancer Inst 81 (24): 1879-86, 1989.2593165 90079979
Nichols HB, Schoemaker MJ, Cai J, et al.: Breast Cancer Risk After Recent Childbirth: A Pooled Analysis of 15 Prospective Studies. Ann Intern Med 170 (1): 22-30, 2019.30534999
Col: Breast cancer and breastfeeding: collaborative reanalysis of individual data from 47 epidemiological studies in 30 countries, including 50302 women with breast cancer and 96973 women without the disease. Lancet 360 (9328): 187-95, 2002.12133652 22129315
Furberg H, Newman B, Moorman P, et al.: Lactation and breast cancer risk. Int J Epidemiol 28 (3): 396-402, 1999.10405840 99334312
Fournier A, Dos Santos G, Guillas G, et al.: Recent recreational physical activity and breast cancer risk in postmenopausal women in the E3N cohort. Cancer Epidemiol Biomarkers Prev 23 (9): 1893-902, 2014.25114017
Eliassen AH, Hankinson SE, Rosner B, et al.: Physical activity and risk of breast cancer among postmenopausal women. Arch Intern Med 170 (19): 1758-64, 2010.20975025
Pizot C, Boniol M, Mullie P, et al.: Physical activity, hormone replacement therapy and breast cancer risk: A meta-analysis of prospective studies. Eur J Cancer 52: 138-54, 2016.26687833
Hardefeldt PJ, Penninkilampi R, Edirimanne S, et al.: Physical Activity and Weight Loss Reduce the Risk of Breast Cancer: A Meta-analysis of 139 Prospective and Retrospective Studies. Clin Breast Cancer 18 (4): e601-e612, 2018.29223719

## Interventions With Adequate Evidence of Benefit

### Selective Estrogen Receptor Modulators (SERMs)

#### Tamoxifen

Tamoxifen is used to treat metastatic breast cancer and to suppress local recurrences and new primary breast cancers after surgical excision of breast cancer.[1] Tamoxifen also maintains bone density among postmenopausal women with breast cancer.[2-6] Adverse effects include hot flashes, venous thromboembolic events, and endometrial cancer.[7-9]

The Breast Cancer Prevention Trial (BCPT) randomly assigned 13,388 patients at elevated risk of breast cancer to receive tamoxifen or placebo.[10,11] The study was closed early because the incidence of breast cancer for the tamoxifen group was 49% lower than for the control group (85 vs. 154 invasive breast cancer cases and 31 vs. 59 in situ cases at 4 years). Tamoxifen-treated women also had fewer fractures (47 vs. 71) but more endometrial cancer (33 vs. 14 cases) and thrombotic events (99 vs. 70), including pulmonary emboli (17 vs. 6).[11]

An update of the BCPT results after 7 years of follow-up confirmed and extended those results.[12] Benefits and risks of tamoxifen were not significantly different from those in the original report, with persistent benefit of fewer fractures and persistent increased risk of endometrial cancer, thrombosis, and cataract surgery. No overall mortality benefit was observed after 7 years of follow-up (relative risk [RR], 1.10; 95% confidence interval [CI], 0.85–1.43).

Three other trials of tamoxifen for primary prevention of breast cancer have been completed.[13-15]

- A study in the United Kingdom [13] enrolled 2,471 women at increased breast cancer risk because of a family history of breast and/or ovarian cancer. Risk of estrogen receptor–positive (ER-positive) breast cancer was significantly reduced in the tamoxifen arm (hazard ratio [HR], 0.61; 95% CI, 0.43–0.86), an effect noted predominantly in the posttreatment period. Overall, tamoxifen was associated with decreased breast cancer risk at 13 years (HR, 0.78; 95% CI, 0.58–1.04) but not at 6 years (RR, 1.06).[16]
- An Italian study [14] focused on 5,408 women who had undergone hysterectomy and who were described as low to normal risk. After nearly 4 years of follow-up, no protective effect of tamoxifen was observed. Longer follow-up and subgroup analysis in this trial found a protective effect of tamoxifen among women at high risk for hormone receptor–positive breast cancer (RR, 0.24; 95% CI, 0.10–0.59) and among women who were taking HT during the trial (RR, 0.43; 95% CI, 0.20–0.95).[17,18]
- The International Breast Cancer Intervention Study (IBIS-I) randomly assigned 7,152 women aged 35 to 70 years who were at an increased risk of breast cancer to receive tamoxifen (20 mg/day) or placebo for 5 years.[15] After a median follow-up of 50 months, fewer tamoxifen-treated women had developed invasive or in situ breast cancer (absolute rate, 4.6 vs. 6.75 per 1,000 woman-years; risk reduction, 32%; 95% CI, 8%–50%). The RR reduction in ER-positive invasive breast cancer was 31%; there was no reduction in estrogen receptor–negative (ER-negative) cancers. The nonsignificant increase in all-cause mortality in the tamoxifen group (25 vs. 11; P = .028) was attributed to chance. The beneficial effect of tamoxifen on breast cancer persisted beyond active treatment; 46 months after the 5-year treatment, fewer women in the tamoxifen arm developed breast cancer (142 vs. 195 cases; RR, 0.73; 95% CI, 0.58–0.91).[19]

A meta-analysis of these primary prevention tamoxifen trials showed a 38% reduction in the incidence of breast cancer without statistically significant heterogeneity.[9] Incidence rates of ER-positive tumors were reduced by 48%. Rates of endometrial cancer were increased (consensus RR, 2.4; 95% CI, 1.5–4.0), as were venous thromboembolic events (RR, 1.9; 95% CI, 1.4–2.6). None of these primary prevention trials was designed to detect differences in breast cancer mortality.

The Cochrane Database of Systematic Reviews found that tamoxifen administered at the standard dose of 20 mg/day for 5 years is effective in decreasing breast cancer incidence, but the increased risk of toxicity has limited its broad use.[20] This finding warrants further investigation because the clinical implications of the lower dose, whether it may prevent cancer or improve mortality, was not studied.

Women with a history of ductal carcinoma in situ (DCIS) are at increased risk of contralateral breast cancer. The National Surgical Adjuvant Breast and Bowel Project (NSABP) trial B-24 addressed the management of these patients. Women were randomly assigned to receive lumpectomy and radiation therapy either with or without adjuvant tamoxifen. At 6 years, the tamoxifen-treated women had fewer invasive and in situ breast cancers (8.2% vs. 13.4%; RR, 0.63; 95% CI, 0.47–0.83). The risk of contralateral breast cancer was also lower in women treated with tamoxifen (RR, 0.49; 95% CI, 0.26–0.87).[21]

##### Low-dose tamoxifen

The above-referenced clinical trials assessed tamoxifen use at a dose of 20 mg per day taken for 5 years. Because of the toxicity associated with tamoxifen and low adherence rates, several recent studies have examined the effects of lower-dose tamoxifen. In a double-blind, placebo-controlled, randomized controlled trial, researchers at the Karolinska Institutet found that a lower dose of 2.5 mg was similarly effective in reducing breast density as was a 20 mg dose. This effect was most pronounced in premenopausal women. In addition, vasomotor symptoms declined as the dose of tamoxifen decreased. The authors postulated that decreased mammographic density may be a surrogate for response to tamoxifen therapy and that adherence may improve with less severe symptoms.[22]

The TAM-01 randomized, placebo-controlled, double-blind study examined the use of low-dose (5 mg) tamoxifen as a strategy to prevent invasive breast cancer.[23] The study enrolled 500 women aged 75 years and younger with hormone-sensitive (67%) or unknown breast intraepithelial neoplasia, including atypical ductal hyperplasia, lobular carcinoma in situ, and DCIS (69%); 60% of the women were postmenopausal. Patients in the treatment group received tamoxifen 5 mg per day for 3 years. Of those with DCIS, 45% received radiation therapy. The following results were reported:

- After a median follow-up of 9.7 years, there were 25 breast cancers in the tamoxifen group (41 invasive cancers) and 41 in the placebo group (59 invasive) (HR, 0.58; 95% CI, 0.35–0.95; log-rank P = .03).
- For contralateral breast cancers, there were 6 events in the tamoxifen group and 16 in the placebo group (HR, 0.36; 95% CI, 0.14–0.92; P = .025). During the 3-year treatment period, there were 12 serious adverse events with tamoxifen and 16 with placebo. There was one deep vein thrombosis and one stage I endometrial cancer with tamoxifen treatment and one pulmonary embolism with placebo. A limitation of this study is the small sample size.
- Post-hoc sub-group analyses suggested possible clinically important differences in effects by menopausal status. The study was also not powered to assess differences in effect by DCIS versus non-DCIS breast disease. However, particularly in the United States, DCIS is typically managed differently than atypia.

#### Raloxifene

Raloxifene hydrochloride (Evista) is a SERM that has antiestrogenic effects on breast and estrogenic effects on bone, lipid metabolism, and blood clotting. Unlike tamoxifen, it has antiestrogenic effects on the endometrium.[24] The Multiple Outcomes of Raloxifene Evaluation (MORE) trial was a randomized, double-blind trial that evaluated 7,705 postmenopausal women with osteoporosis from 1994 to 1998 at 180 clinical centers in the United States. Vertebral fractures were reduced. The effect on breast cancer incidence was a secondary end point. After a median follow-up of 47 months, the risk of invasive breast cancer was decreased in the raloxifene-treated women (RR, 0.25; 95% CI, 0.17–0.45).[25] As with tamoxifen, raloxifene reduced the risk of ER-positive breast cancer but not ER-negative breast cancer and was associated with an excess risk of hot flashes and thromboembolic events. No excess risk of endometrial cancer or hyperplasia was observed.[26]

An extension of the MORE trial was the Continuing Outcomes Relevant to Evista (CORE) trial, which studied about 80% of MORE participants in their randomly assigned groups for an additional 4 years. Although there was a median 10-month gap between the two studies, and only about 55% of women were adherent to their assigned medications, the raloxifene group continued to experience a lower incidence of invasive ER-positive breast cancer. The overall reduction in invasive breast cancer during the 8 years of MORE and CORE was 66% (HR, 0.34; 95% CI, 0.22–0.50); the reduction for ER-positive invasive breast cancer was 76% (HR, 0.24; 95% CI, 0.15–0.40).[27]

The Raloxifene Use for the Heart trial was a randomized, placebo-controlled trial to evaluate the effects of raloxifene on incidence of coronary events and invasive breast cancer. As in the MORE and CORE studies, raloxifene reduced the risk of invasive breast cancer (HR, 0.56; 95% CI, 0.38–0.83).[28]

The Study of Tamoxifen and Raloxifene (STAR) (NSABP P-2) compared tamoxifen and raloxifene in 19,747 high-risk women who were monitored for a mean of 3.9 years. Invasive breast cancer incidence was approximately the same for both drugs, but there were fewer noninvasive cancers in the tamoxifen group. Adverse events of uterine cancer, venous thromboembolic events, and cataracts were more common in tamoxifen-treated women, and there was no difference in ischemic heart disease events, strokes, or fractures.[29] Treatment-associated symptoms of dyspareunia, musculoskeletal problems, and weight gain occurred less frequently in tamoxifen-treated women, whereas vasomotor flushing, bladder control symptoms, gynecologic symptoms, and leg cramps occurred less frequently in those receiving raloxifene.[30]

Table 2. Incidence of Outcomes Per 1,000 Women

| Tamoxifen | Raloxifene | RR, 95% CI
Invasive breast cancer | 4.3 | 4.41 | 1.02, 0.82–1.28
Noninvasive breast cancer | 1.51 | 2.11 | 1.4, 0.98–2.00
Uterine cancer | 2.0 | 1.25 | 0.62, 0.35–1.08
VTE | 3.8 | 2.6 | 0.7, 0.68–0.99
Cataracts | 12.3 | 9.72 | 0.79, 0.68–0.92
Incidence of Symptoms (0–4 scale)
Favor Tamoxifen
Dyspareunia | 0.68 | 0.78 | P < .001
Musculoskeletal problems | 1.10 | 1.15 | P = .002
Weight gain | 0.76 | 0.82 | P < .001
Favor Raloxifene
Vasomotor symptoms | 0.96 | 0.85 | P < .001
Bladder control symptoms | 0.88 | 0.73 | P < .001
Leg cramps | 1.10 | 0.91 | P < .001
Gynecologic problems | 0.29 | 0.19 | P < .001

CI = confidence interval; RR = relative risk; VTE = venous thromboembolism.

### Aromatase Inhibitors or Inactivators (Als)

Another class of agents used to treat women with hormone-sensitive breast cancer may also prevent breast cancer. These drugs interfere with aromatase, the adrenal enzyme that allows estrogen production in postmenopausal women. Anastrozole and letrozole inhibit aromatase activity, whereas exemestane inactivates the enzyme. Side effects for all three drugs include fatigue, arthralgia, myalgia, decreased bone mineral density, and increased fracture rate.

Women with a previous diagnosis of breast cancer have a lower risk of recurrence and of new breast cancers when treated with AIs, as shown in the following studies:

1. In the Arimidex, Tamoxifen, Alone or in Combination trial, which compared anastrozole with tamoxifen as adjuvant therapy for primary breast cancer, the rate of locoregional and distant recurrence was lower for anastrozole when compared with tamoxifen (7.1% vs. 8.5%) but higher for the combination (9.1%).[31] Anastrozole was also more effective in reducing the incidence of new contralateral breast cancer (0.4% vs. 1.1% vs. 0.9%).
2. In another trial, 5,187 women who received 5 years of adjuvant tamoxifen were randomly assigned to receive either letrozole or placebo.[32] After only 2.5 years of median follow-up, the study was terminated because previously defined efficacy end points had been reached. Patients treated with letrozole had a lower incidence of locoregional and distant cancer recurrence and a lower incidence of new contralateral breast cancer (14 vs. 26).
3. Another placebo-controlled trial of 1,918 women with breast cancer examined the effect of extending letrozole treatment for an additional 5 years in women who had received adjuvant tamoxifen followed by 5 years of letrozole.[33] At a median of 6.3 years from study entry, the extended letrozole group had an improved 5-year disease-free survival rate of 95% (95% CI, 93%–96%) compared with 91% (95% CI, 89%–93%) for the control group (HR, 0.66) but no difference in overall survival. The difference in new contralateral breast cancer diagnoses was statistically significant: 21% (95% CI, 10%–32%) for the extended letrozole group compared with 49% (32%–67%) for the control group (HR, 0.42). Women treated with letrozole had an increased risk of bone pain (18% vs. 14%), bone fracture (14% vs. 9%), and new-onset osteoporosis (11% vs. 6%).
4. A trial randomly assigned 4,742 women who had received 2 years of adjuvant tamoxifen to either continue the tamoxifen or switch to exemestane.[34] After 2.4 years of median follow-up, the exemestane group had a decreased risk of local or metastatic recurrence and a decreased incidence of new contralateral breast cancer (9 vs. 20).

Aromatase inhibitors or inactivators also have been shown to prevent breast cancer in women at increased risk, as shown in the following studies:

1. An RCT of primary prevention of breast cancer compared exemestane with placebo in 4,560 women with at least one risk factor (age >60 years, a Gail 5-year risk >1.66%, or a history of DCIS with mastectomy). After 35 months of median follow-up, invasive breast cancer was diagnosed less frequently in the exemestane group (11 vs. 32; HR, 0.35; 95% CI, 0.18–0.70; number needed-to-treat, about 100 for 35 months). Compared with the placebo group, the exemestane-treated women had more hot flashes (increase, 8%) and fatigue (increase, 2%) but no difference in fractures or cardiovascular events.[35]
2. The International Breast Cancer Intervention Study II (IBIS-II) randomly assigned 3,864 postmenopausal women who were at increased risk of developing breast cancer to receive either daily anastrozole (1 mg) or placebo for 5 years.[36] After a median follow-up of 5 years, fewer breast cancers (invasive and DCIS) occurred in the anastrozole-treated group than in the placebo group (HR, 0.47; 95% CI, 0.32–0.68). The risk of hormone receptor–positive, but not hormone receptor–negative, breast cancer was reduced. Additional follow-up, up to a median of 131 months, showed continued benefit for women treated with anastrozole, who had a 49% reduction in breast cancer (HR, 0.51; 95% CI, 0.39–0.66). No difference in breast cancer mortality was observed.[37] Women treated with anastrozole were more likely than those taking placebo to have musculoskeletal symptoms, including arthralgias (51% vs. 46%), joint stiffness (7% vs. 5%), carpal tunnel syndrome (3% vs. 2%); hypertension (5% vs. 3%); vasomotor symptoms (57% vs. 49%); and dry eyes (4% vs. 2%).

### Prophylactic Mastectomy

A retrospective cohort study evaluated the impact of bilateral prophylactic mastectomy on breast cancer incidence among women at high and moderate risk on the basis of family history.[38] BRCA mutation status was not known. Subcutaneous, rather than total, mastectomy was performed in 90% of these women. After a median follow-up of 14 years postsurgery, the risk reduction for the 425 moderate-risk women was 89%; for the 214 high-risk women, it was 90% to 94%, depending on the method used to calculate expected rates of breast cancer. The risk reduction for breast cancer mortality was 100% for moderate-risk women and 81% for high-risk women. Because the study used family history as a risk indicator rather than genetic testing, breast cancer risk may be overestimated.

Contralateral prophylactic mastectomy (CPM) refers to the surgical removal of the opposite uninvolved breast in women who present with unilateral breast cancer. Women who undergo CPM therefore generally undergo bilateral mastectomy for the treatment of unilateral breast cancer, and rates of this procedure among women with unilateral disease (DCIS and early-stage invasive breast cancer) was reported to have increased from 1.9% in 1998 to 11.2% in 2011 based on data from the U.S. National Cancer Data Base.[39]

Some observational studies have suggested that CPM is associated with reduced breast cancer mortality, but these results are generally attributed to selection bias. As of yet, there is no high-quality evidence that CPM is associated with improvements in overall survival. However, some women with unilateral breast cancer, who have a high risk of developing contralateral breast cancer, may reasonably choose CPM to reduce the risk of a new primary cancer in the opposite breast.[40]

### Prophylactic Oophorectomy

Ovarian ablation and oophorectomy are associated with decreased breast cancer risk in average-risk women and in women with increased risk resulting from thoracic irradiation. For more information, see the Endogenous Estrogen section. Observational studies of women with high breast cancer risk resulting from BRCA1 or BRCA2 gene mutations showed that prophylactic oophorectomy to prevent ovarian cancer was also associated with a 50% decrease in breast cancer incidence.[41-43] These studies are confounded by selection bias, family relationships between patients and controls, indications for oophorectomy, and inadequate information about hormone use. A prospective cohort study had similar findings, with a greater breast cancer risk reduction in BRCA2 mutation carriers than in BRCA1 carriers.[44]

### References

Nayfield SG, Karp JE, Ford LG, et al.: Potential role of tamoxifen in prevention of breast cancer. J Natl Cancer Inst 83 (20): 1450-9, 1991.1920492 92015314
Love RR, Barden HS, Mazess RB, et al.: Effect of tamoxifen on lumbar spine bone mineral density in postmenopausal women after 5 years. Arch Intern Med 154 (22): 2585-8, 1994.7979855 95070642
Powles TJ, Hickish T, Kanis JA, et al.: Effect of tamoxifen on bone mineral density measured by dual-energy x-ray absorptiometry in healthy premenopausal and postmenopausal women. J Clin Oncol 14 (1): 78-84, 1996.8558225 96140284
Costantino JP, Kuller LH, Ives DG, et al.: Coronary heart disease mortality and adjuvant tamoxifen therapy. J Natl Cancer Inst 89 (11): 776-82, 1997.9182975 97325963
McDonald CC, Stewart HJ: Fatal myocardial infarction in the Scottish adjuvant tamoxifen trial. The Scottish Breast Cancer Committee. BMJ 303 (6800): 435-7, 1991.1912833 92004283
Rutqvist LE, Mattsson A: Cardiac and thromboembolic morbidity among postmenopausal women with early-stage breast cancer in a randomized trial of adjuvant tamoxifen. The Stockholm Breast Cancer Study Group. J Natl Cancer Inst 85 (17): 1398-406, 1993.8350363 93353542
Fisher B, Costantino JP, Redmond CK, et al.: Endometrial cancer in tamoxifen-treated breast cancer patients: findings from the National Surgical Adjuvant Breast and Bowel Project (NSABP) B-14. J Natl Cancer Inst 86 (7): 527-37, 1994.8133536 94180408
Bergman L, Beelen ML, Gallee MP, et al.: Risk and prognosis of endometrial cancer after tamoxifen for breast cancer. Comprehensive Cancer Centres' ALERT Group. Assessment of Liver and Endometrial cancer Risk following Tamoxifen. Lancet 356 (9233): 881-7, 2000.11036892 20488363
Cuzick J, Powles T, Veronesi U, et al.: Overview of the main outcomes in breast-cancer prevention trials. Lancet 361 (9354): 296-300, 2003.12559863
Redmond CK, Wickerham DL, Cronin W, et al.: The NSABP breast cancer prevention trial (BCPT): a progress report. [Abstract] Proceedings of the American Society of Clinical Oncology 12: A-78, 69, 1993.
Fisher B, Costantino JP, Wickerham DL, et al.: Tamoxifen for prevention of breast cancer: report of the National Surgical Adjuvant Breast and Bowel Project P-1 Study. J Natl Cancer Inst 90 (18): 1371-88, 1998.9747868 98418640
Fisher B, Costantino JP, Wickerham DL, et al.: Tamoxifen for the prevention of breast cancer: current status of the National Surgical Adjuvant Breast and Bowel Project P-1 study. J Natl Cancer Inst 97 (22): 1652-62, 2005.16288118
Powles T, Eeles R, Ashley S, et al.: Interim analysis of the incidence of breast cancer in the Royal Marsden Hospital tamoxifen randomised chemoprevention trial. Lancet 352 (9122): 98-101, 1998.9672274 98336018
Veronesi U, Maisonneuve P, Costa A, et al.: Prevention of breast cancer with tamoxifen: preliminary findings from the Italian randomised trial among hysterectomised women. Italian Tamoxifen Prevention Study. Lancet 352 (9122): 93-7, 1998.9672273 98336017
Cuzick J, Forbes J, Edwards R, et al.: First results from the International Breast Cancer Intervention Study (IBIS-I): a randomised prevention trial. Lancet 360 (9336): 817-24, 2002.12243915
Powles TJ, Ashley S, Tidy A, et al.: Twenty-year follow-up of the Royal Marsden randomized, double-blinded tamoxifen breast cancer prevention trial. J Natl Cancer Inst 99 (4): 283-90, 2007.17312305
Veronesi U, Maisonneuve P, Rotmensz N, et al.: Tamoxifen for the prevention of breast cancer: late results of the Italian Randomized Tamoxifen Prevention Trial among women with hysterectomy. J Natl Cancer Inst 99 (9): 727-37, 2007.17470740
Martino S, Costantino J, McNabb M, et al.: The role of selective estrogen receptor modulators in the prevention of breast cancer: comparison of the clinical trials. Oncologist 9 (2): 116-25, 2004.15047916
Cuzick J, Forbes JF, Sestak I, et al.: Long-term results of tamoxifen prophylaxis for breast cancer--96-month follow-up of the randomized IBIS-I trial. J Natl Cancer Inst 99 (4): 272-82, 2007.17312304
Mocellin S, Goodwin A, Pasquali S: Risk-reducing medications for primary breast cancer: a network meta-analysis. Cochrane Database Syst Rev 4 (4): CD012191, 2019.31032883
Fisher B, Dignam J, Wolmark N, et al.: Tamoxifen in treatment of intraductal breast cancer: National Surgical Adjuvant Breast and Bowel Project B-24 randomised controlled trial. Lancet 353 (9169): 1993-2000, 1999.10376613 99303106
Eriksson M, Eklund M, Borgquist S, et al.: Low-Dose Tamoxifen for Mammographic Density Reduction: A Randomized Controlled Trial. J Clin Oncol 39 (17): 1899-1908, 2021.33734864
Lazzeroni M, Puntoni M, Guerrieri-Gonzaga A, et al.: Randomized Placebo Controlled Trial of Low-Dose Tamoxifen to Prevent Recurrence in Breast Noninvasive Neoplasia: A 10-Year Follow-Up of TAM-01 Study. J Clin Oncol 41 (17): 3116-3121, 2023.36917758
Khovidhunkit W, Shoback DM: Clinical effects of raloxifene hydrochloride in women. Ann Intern Med 130 (5): 431-9, 1999.10068418 99156327
Cauley JA, Norton L, Lippman ME, et al.: Continued breast cancer risk reduction in postmenopausal women treated with raloxifene: 4-year results from the MORE trial. Multiple outcomes of raloxifene evaluation. Breast Cancer Res Treat 65 (2): 125-34, 2001.11261828 21158280
Cummings SR, Eckert S, Krueger KA, et al.: The effect of raloxifene on risk of breast cancer in postmenopausal women: results from the MORE randomized trial. Multiple Outcomes of Raloxifene Evaluation. JAMA 281 (23): 2189-97, 1999.10376571 99303064
Martino S, Cauley JA, Barrett-Connor E, et al.: Continuing outcomes relevant to Evista: breast cancer incidence in postmenopausal osteoporotic women in a randomized trial of raloxifene. J Natl Cancer Inst 96 (23): 1751-61, 2004.15572757
Grady D, Cauley JA, Geiger MJ, et al.: Reduced incidence of invasive breast cancer with raloxifene among women at increased coronary risk. J Natl Cancer Inst 100 (12): 854-61, 2008.18544744
Vogel VG, Costantino JP, Wickerham DL, et al.: Effects of tamoxifen vs raloxifene on the risk of developing invasive breast cancer and other disease outcomes: the NSABP Study of Tamoxifen and Raloxifene (STAR) P-2 trial. JAMA 295 (23): 2727-41, 2006.16754727
Land SR, Wickerham DL, Costantino JP, et al.: Patient-reported symptoms and quality of life during treatment with tamoxifen or raloxifene for breast cancer prevention: the NSABP Study of Tamoxifen and Raloxifene (STAR) P-2 trial. JAMA 295 (23): 2742-51, 2006.16754728
The ATAC Trialists' Group. Arimidex, tamoxifen alone or in combination: Anastrozole alone or in combination with tamoxifen versus tamoxifen alone for adjuvant treatment of postmenopausal women with early breast cancer: first results of the ATAC randomised trial. Lancet 359 (9324): 2131-9, 2002.12090977 22086512
Goss PE, Ingle JN, Martino S, et al.: A randomized trial of letrozole in postmenopausal women after five years of tamoxifen therapy for early-stage breast cancer. N Engl J Med 349 (19): 1793-802, 2003.14551341 22965325
Goss PE, Ingle JN, Pritchard KI, et al.: Extending Aromatase-Inhibitor Adjuvant Therapy to 10 Years. N Engl J Med 375 (3): 209-19, 2016.27264120
Coombes RC, Hall E, Gibson LJ, et al.: A randomized trial of exemestane after two to three years of tamoxifen therapy in postmenopausal women with primary breast cancer. N Engl J Med 350 (11): 1081-92, 2004.15014181
Goss PE, Ingle JN, Alés-Martínez JE, et al.: Exemestane for breast-cancer prevention in postmenopausal women. N Engl J Med 364 (25): 2381-91, 2011.21639806
Cuzick J, Sestak I, Forbes JF, et al.: Anastrozole for prevention of breast cancer in high-risk postmenopausal women (IBIS-II): an international, double-blind, randomised placebo-controlled trial. Lancet 383 (9922): 1041-8, 2014.24333009
Batur P: In high-risk, postmenopausal women, 5 years of anastrozole reduced breast cancer incidence at 11 years. Ann Intern Med 172 (8): JC45, 2020.32311729
Hartmann LC, Schaid DJ, Woods JE, et al.: Efficacy of bilateral prophylactic mastectomy in women with a family history of breast cancer. N Engl J Med 340 (2): 77-84, 1999.9887158 99091091
Kummerow KL, Du L, Penson DF, et al.: Nationwide trends in mastectomy for early-stage breast cancer. JAMA Surg 150 (1): 9-16, 2015.25408966
Carbine NE, Lostumbo L, Wallace J, et al.: Risk-reducing mastectomy for the prevention of primary breast cancer. Cochrane Database Syst Rev 4: CD002748, 2018.29620792
Rebbeck TR, Levin AM, Eisen A, et al.: Breast cancer risk after bilateral prophylactic oophorectomy in BRCA1 mutation carriers. J Natl Cancer Inst 91 (17): 1475-9, 1999.10469748 99400811
Kauff ND, Satagopan JM, Robson ME, et al.: Risk-reducing salpingo-oophorectomy in women with a BRCA1 or BRCA2 mutation. N Engl J Med 346 (21): 1609-15, 2002.12023992 22022073
Rebbeck TR, Lynch HT, Neuhausen SL, et al.: Prophylactic oophorectomy in carriers of BRCA1 or BRCA2 mutations. N Engl J Med 346 (21): 1616-22, 2002.12023993 22022074
Kauff ND, Domchek SM, Friebel TM, et al.: Risk-reducing salpingo-oophorectomy for the prevention of BRCA1- and BRCA2-associated breast and gynecologic cancer: a multicenter, prospective study. J Clin Oncol 26 (8): 1331-7, 2008.18268356

## Factors and Interventions With Inadequate Evidence of an Association

### Hormonal Contraceptives

Oral contraceptives have been associated with a small increased risk of breast cancer in current users that diminishes over time.[1] A well-conducted case-control study did not observe an association between breast cancer risk and oral contraceptive use for ever use, duration of use, or recent use.[2]

Another case-control study found no increased risk of breast cancer associated with the use of injectable or implantable progestin-only contraceptives in women aged 35 to 64 years.[3]

A nationwide prospective cohort study in Denmark found that women who currently or recently used hormonal contraceptives had a higher risk of breast cancer than did women who had never used hormonal contraceptives. Moreover, the risk of breast cancer increased with longer duration of hormonal contraceptive use. However, in absolute terms, the effect of oral contraceptives on breast cancer risk was very small; approximately one extra case of breast cancer may be expected for every 7,690 women using hormonal contraception for 1 year.[4]

### Environmental Factors

Occupational, environmental, or chemical exposures have all been proposed as causes of breast cancer. Meta-analyses, describing up to 134 environmental chemicals, their sources, and biomarkers of their exposures, suggest that some may be associated with cancer.[5,6] Epidemiological and animal data summarized by the National Academy of Medicine [7] and the Interagency Breast Cancer and Environmental Research Coordinating Committee [8] for a wide range of metals, chemicals, and consumer products indicated that there may be biological plausibility for an association between breast cancer risk and environmental factors. However, the data were largely inconclusive as to whether or not definitive associations exist between specific exposures and increased breast cancer risk, particularly at levels relevant to the general population.

Clearly determining whether specific environmental exposures influence the risk of breast cancer in humans poses important challenges. People are exposed to a variable, difficult-to-measure mix of environmental factors over a lifetime; additionally, cancer can take decades to develop after a potential exposure, making accurate recall challenging. Therefore, teasing out the effects of any individual substance on breast cancer risk is not easy. Because so many factors must be considered, any observed associations can be easily confounded by the analytical problems of multiplicities, measurement challenges, and recall and publication bias.[9,10] Additionally, although a specific environmental exposure might be determined to have the potential to be harmful as observed in an animal model or other toxicological studies using high-dose exposures, this does not necessarily mean that the substance, under conditions in which the general human population is exposed, leads to adverse health outcomes. The ultimate risk to human health depends not only on the intrinsic toxic potential of the substance, but also on the dose or amount the population is exposed to and the timing or length of time of the exposure. Overall, available human studies evaluating potential associations between breast cancer and specific environmental exposures are not conclusive.

### References

Breast cancer and hormonal contraceptives: further results. Collaborative Group on Hormonal Factors in Breast Cancer. Contraception 54 (3 Suppl): 1S-106S, 1996.8899264 97054975
Marchbanks PA, McDonald JA, Wilson HG, et al.: Oral contraceptives and the risk of breast cancer. N Engl J Med 346 (26): 2025-32, 2002.12087137 22082198
Strom BL, Berlin JA, Weber AL, et al.: Absence of an effect of injectable and implantable progestin-only contraceptives on subsequent risk of breast cancer. Contraception 69 (5): 353-60, 2004.15105056
Mørch LS, Skovlund CW, Hannaford PC, et al.: Contemporary Hormonal Contraception and the Risk of Breast Cancer. N Engl J Med 377 (23): 2228-2239, 2017.29211679
Brody JG, Rudel RA, Michels KB, et al.: Environmental pollutants, diet, physical activity, body size, and breast cancer: where do we stand in research to identify opportunities for prevention? Cancer 109 (12 Suppl): 2627-34, 2007.17503444
Rodgers KM, Udesky JO, Rudel RA, et al.: Environmental chemicals and breast cancer: An updated review of epidemiological literature informed by biological mechanisms. Environ Res 160: 152-182, 2018.28987728
Institute of Medicine: Breast Cancer and the Environment: A Life Course Approach. The National Academies Press, 2012. Also available online (https://doi.org/10.17226/13263). Last accessed April 9, 2025.
Interagency Breast Cancer and Environmental Research Coordinating Committee: Breast Cancer and The Environment: Prioritizing Prevention. Bethesda, Md: National Institute of Environmental Health Sciences, 2013. Available online (https://www.niehs.nih.gov/about/assets/docs/breast_cancer_and_the_environment_prioritizing_prevention_508.pdf). Last accessed April 9, 2025.
Berry D: Multiplicities in cancer research: ubiquitous and necessary evils. J Natl Cancer Inst 104 (15): 1124-32, 2012.22859849
Dickersin K: The existence of publication bias and risk factors for its occurrence. JAMA 263 (10): 1385-9, 1990.2406472

## Factors and Interventions With Adequate Evidence of Little or No Association

### Abortion

Abortion has been proposed as a risk factor for breast cancer. Findings from observational studies have varied; some studies showed an association, while other studies did not. Observational studies that support this association were less rigorous and potentially biased because of differential recall by women on a socially sensitive issue.[1-4] For example, the impact of recall or reporting bias was demonstrated in a study that compared regions with different social attitudes on abortion.[5] The Committee on Gynecologic Practice of the American College of Obstetricians and Gynecologists has concluded that “more rigorous recent studies demonstrate no causal relationship between induced abortion and a subsequent increase in breast cancer risk.”[6] Studies that used prospectively recorded data regarding abortion, thereby avoiding recall bias, largely showed no association with the subsequent development of breast cancer.[7-12]

### Diet

There is little evidence that dietary modifications of any kind have an impact on the incidence of breast cancer.

Very few randomized trials in humans compare cancer incidence for different diets. Most studies are observational—including post hoc analyses of randomized trials—and are subject to biases that may be so large as to render the observation difficult to interpret. In particular, P values and confidence intervals (CIs) do not have the same interpretation as when calculated for the primary end point in a randomized trial.

A summary of ecological studies published before 1975 showed a positive correlation between international age-adjusted breast cancer mortality rates and the estimated per capita consumption of dietary fat.[13] Results of case-control studies have been mixed. Twenty years later, a pooled analysis of results from seven cohort studies found no association between total dietary fat intake and breast cancer risk.[14]

A randomized, controlled, dietary modification study was undertaken among 48,835 postmenopausal women aged 50 to 79 years who were also enrolled in the Women's Health Initiative. The intervention promoted a goal of reducing total fat intake by 20% by increasing vegetable, fruit, and grain consumption. The intervention group reduced fat intake by approximately 10% for more than 8.1 years of follow-up, resulting in lower estradiol and gamma-tocopherol levels, but no persistent weight loss. The incidence of invasive breast cancer was numerically, but not statistically lower in the intervention group, with a hazard ratio (HR) of 0.91 (95% CI, 0.83–1.01).[15] There was no difference in all-cause mortality, overall mortality, or the incidence of cardiovascular events.[16]

With regard to fruit and vegetable intake, a pooled analysis of eight cohort studies including more than 350,000 women with 7,377 incident breast cancers showed little or no association for various assumed statistical models.[17]

The Women's Healthy Eating and Living Randomized Trial [18] examined the effect of diet on the incidence of new primary breast cancers in women previously diagnosed with breast cancer. More than 3,000 women were enrolled and randomly assigned to an intense regimen of increased fruit and vegetable intake, increased fiber intake, and decreased fat intake, or a comparison group receiving printed materials on the “5-A-Day” dietary guidelines. After a mean of 7.3 years of follow-up, there was no reduction in new primary cancers, no difference in disease-free survival, and no difference in overall survival.

A randomized trial in Spain [19] assigned participants who were at high cardiovascular risk to one of three diets: a Mediterranean diet supplemented with extra-virgin olive oil, a Mediterranean diet supplemented with mixed nuts, or a control Mediterranean diet (counseling to reduce dietary fat). The investigators reported a statistically significant reduction in major cardiovascular events, which was the trial’s primary end point.[20] The investigators also addressed other end points, including the incidence of breast cancer, although it is not specified how many were examined. Based on only 35 cases of invasive breast cancer (as compared with 288 major cardiovascular events), the respective rates of breast cancer were 8 of 1,476 (0.54%); 10 of 1,285 (0.78%); and 17 of 1,391 (1.22%) with respective average follow-up durations of 4.8, 4.3, and 4.2 years. The circumstances of the study make it difficult to determine the statistical significance of these differences.

### Vitamins

The potential role of specific micronutrients for breast cancer risk reduction has been examined in clinical trials, with cardiovascular disease and cancer as outcomes. The Women’s Health Study, a randomized trial with 39,876 women, found no difference in breast cancer incidence at 2 years between women assigned to take either beta carotene or placebo.[21] In this same study, no overall effect on cancer was seen in women taking 600 IU of vitamin E every other day.[22] The Women’s Antioxidant Cardiovascular Study examined 8,171 women for incidence of total cancer and invasive breast cancer and found no effect for vitamin C, vitamin E, or beta carotene.[23] Two years later, a subset of 5,442 women were randomly assigned to take 1.5 mg of folic acid, 50 mg of vitamin B6, and 1 mg of vitamin B12, or placebo. After 7.3 years, there was no difference in the incidence of total invasive cancer or invasive breast cancer.[24]

Fenretinide [25] is a vitamin A analog that has been shown to reduce breast carcinogenesis in preclinical studies. A phase III Italian trial compared the efficacy of a 5-year intervention with fenretinide versus no treatment in 2,972 women, aged 30 to 70 years, with surgically removed stage I breast cancer or DCIS. At a median observation time of 97 months, there were no statistically significant differences in the occurrence of contralateral breast cancer (P = .642), ipsilateral breast cancer (P = .177), incidence of distant metastases, nonbreast malignancies, and all-cause mortality.[26]

### Active and Passive Cigarette Smoking

The potential role of active cigarette smoking in the etiology of breast cancer has been studied for more than three decades, with no clear-cut evidence of an association.[27] Since the mid-1990s, studies of cigarette smoking and breast cancer have more carefully accounted for secondhand smoke exposure.[27,28] A recent meta-analysis suggests that there is no overall association between passive smoking and breast cancer and that study methodology (ascertainment of exposure after breast cancer diagnosis) may be responsible for the apparent risk associations seen in some studies.[29]

### Underarm Deodorants/Antiperspirants

Despite warnings to women in lay publications that underarm deodorants and antiperspirants cause breast cancer, there is no evidence to support these concerns. A study based on interviews with 813 women who had breast cancer and 793 controls found no association between the risk of breast cancer and the use of antiperspirants, the use of deodorants, or the use of blade razors before these products were applied.[30] In contrast, a study of 437 breast cancer survivors found that women who used antiperspirants/deodorants and shaved their underarms more frequently had cancer diagnosed at a significantly younger age. It is likely that this finding could be explained by differences in endogenous hormones rather than shaving and antiperspirant/deodorant use. Early menarche and increased body hair are both associated with increased levels of endogenous hormones, known to be risk factors for breast cancer.[31]

### Statins

Two well-conducted meta-analyses of randomized controlled trials (RCTs) [32] and RCTs plus observational studies [33] found no evidence that statin use either increases or decreases the risk of breast cancer.

### Bisphosphonates

Oral and intravenous bisphosphonates for the treatment of hypercalcemia and osteoporosis have been studied for a possible beneficial effect on breast cancer prevention. Initial observational studies suggested that women who used these drugs for durations of approximately 1 to 4 years had a lower incidence of breast cancer.[34- 37] These findings are confounded by the fact that women with osteoporosis have lower breast cancer risk than those with normal bone density. Additional evidence came from studies of women with a breast cancer diagnosis; the use of these drugs was associated with fewer new contralateral cancers.[38] With this background, two large randomized placebo-controlled trials were done. The Fracture Intervention Trial (FIT) treated 6,194 postmenopausal osteopenic women with either alendronate or placebo and found no difference at 3.8 years in breast cancer incidence, with incidence of 1.8% and 1.5%, respectively (HR, 1.24; 95% CI, 0.84–1.83). The Health Outcomes and Reduced Incidence With Zoledronic Acid Once Yearly-Pivotal Fracture Trial (HORIZON-PRT) examined 7,580 postmenopausal osteoporotic women with either intravenous zoledronate or placebo and found no difference at 2.8 years in breast cancer incidence, with incidence of 0.8% and 0.9%, respectively (HR, 1.15; 95% CI, 0.7–1.89).[39]

### Working Night Shifts

Based on evidence from animal studies, the World Health Organization’s International Agency for Research on Cancer (IARC) classified shift work that involves circadian disruption as a probable breast carcinogen.[40] In 2013, a meta-analysis of 15 epidemiological studies found only weak evidence of an increased incidence of breast cancer among women who had ever worked night shifts.[41] In 2016, the results from three recent prospective studies from the United Kingdom, involving nearly 800,000 women, were combined with results from seven other prospective studies and showed no evidence of any association between breast cancer incidence and night shift work. In particular, the confidence intervals for the incidence rate ratios were narrow, even for 20 years or more of night shift work (rate ratio, 1.01; 95% CI, 0.93–1.10). These results exclude a moderate association of breast cancer incidence with long duration of night shift work.[42]

The U.K. Generations Study was established in 2003 to address risk factors and causes of breast cancer. In a prospective cohort of 105,000 women, information was obtained by questionnaire on bedroom light levels at night at the time of study recruitment and at age 20 years. They followed women for an average of 6.1 years and observed 1,775 breast cancers. Adjusting for potentially confounding factors, including night shift work, they found no evidence that the amount of bedroom light at night was associated with breast cancer risk. For the highest-to-lowest levels of light at night, the HR of breast cancer incidence was 1.01 (95% CI, 0.88–1.15).[43]

### References

Huang Y, Zhang X, Li W, et al.: A meta-analysis of the association between induced abortion and breast cancer risk among Chinese females. Cancer Causes Control 25 (2): 227-36, 2014.24272196
Sanderson M, Shu XO, Jin F, et al.: Abortion history and breast cancer risk: results from the Shanghai Breast Cancer Study. Int J Cancer 92 (6): 899-905, 2001.11351314 21248730
Beral V, Bull D, Doll R, et al.: Breast cancer and abortion: collaborative reanalysis of data from 53 epidemiological studies, including 83,000 women with breast cancer from 16 countries. Lancet 363 (9414): 1007-16, 2004.15051280
Melbye M, Wohlfahrt J, Olsen JH, et al.: Induced abortion and the risk of breast cancer. N Engl J Med 336 (2): 81-5, 1997.8988884 97130062
Rookus MA, van Leeuwen FE: Induced abortion and risk for breast cancer: reporting (recall) bias in a Dutch case-control study. J Natl Cancer Inst 88 (23): 1759-64, 1996.8944006 97099429
Committee on Gynecologic Practice: ACOG Committee Opinion No. 434: induced abortion and breast cancer risk. Obstet Gynecol 113 (6): 1417-8, 2009.19461458
Henderson KD, Sullivan-Halley J, Reynolds P, et al.: Incomplete pregnancy is not associated with breast cancer risk: the California Teachers Study. Contraception 77 (6): 391-6, 2008.18477486
Lash TL, Fink AK: Null association between pregnancy termination and breast cancer in a registry-based study of parous women. Int J Cancer 110 (3): 443-8, 2004.15095312
Michels KB, Xue F, Colditz GA, et al.: Induced and spontaneous abortion and incidence of breast cancer among young women: a prospective cohort study. Arch Intern Med 167 (8): 814-20, 2007.17452545
Wu JQ, Li YY, Ren JC, et al.: Induced abortion and breast cancer: results from a population-based case control study in China. Asian Pac J Cancer Prev 15 (8): 3635-40, 2014.24870770
Braüner CM, Overvad K, Tjønneland A, et al.: Induced abortion and breast cancer among parous women: a Danish cohort study. Acta Obstet Gynecol Scand 92 (6): 700-5, 2013.23402419
Guo J, Huang Y, Yang L, et al.: Association between abortion and breast cancer: an updated systematic review and meta-analysis based on prospective studies. Cancer Causes Control 26 (6): 811-9, 2015.25779378
Carroll KK, Khor HT: Dietary fat in relation to tumorigenesis. Prog Biochem Pharmacol 10: 308-53, 1975.165553 75158616
Hunter DJ, Spiegelman D, Adami HO, et al.: Cohort studies of fat intake and the risk of breast cancer--a pooled analysis. N Engl J Med 334 (6): 356-61, 1996.8538706 96140458
Prentice RL, Caan B, Chlebowski RT, et al.: Low-fat dietary pattern and risk of invasive breast cancer: the Women's Health Initiative Randomized Controlled Dietary Modification Trial. JAMA 295 (6): 629-42, 2006.16467232
Howard BV, Van Horn L, Hsia J, et al.: Low-fat dietary pattern and risk of cardiovascular disease: the Women's Health Initiative Randomized Controlled Dietary Modification Trial. JAMA 295 (6): 655-66, 2006.16467234
Smith-Warner SA, Spiegelman D, Yaun SS, et al.: Intake of fruits and vegetables and risk of breast cancer: a pooled analysis of cohort studies. JAMA 285 (6): 769-76, 2001.11176915 21105481
Pierce JP, Natarajan L, Caan BJ, et al.: Influence of a diet very high in vegetables, fruit, and fiber and low in fat on prognosis following treatment for breast cancer: the Women's Healthy Eating and Living (WHEL) randomized trial. JAMA 298 (3): 289-98, 2007.17635889
Toledo E, Salas-Salvadó J, Donat-Vargas C, et al.: Mediterranean Diet and Invasive Breast Cancer Risk Among Women at High Cardiovascular Risk in the PREDIMED Trial: A Randomized Clinical Trial. JAMA Intern Med 175 (11): 1752-60, 2015.26365989
Estruch R, Ros E, Salas-Salvadó J, et al.: Primary prevention of cardiovascular disease with a Mediterranean diet. N Engl J Med 368 (14): 1279-90, 2013.23432189
Lee IM, Cook NR, Manson JE, et al.: Beta-carotene supplementation and incidence of cancer and cardiovascular disease: the Women's Health Study. J Natl Cancer Inst 91 (24): 2102-6, 1999.10601381 20071042
Lee IM, Cook NR, Gaziano JM, et al.: Vitamin E in the primary prevention of cardiovascular disease and cancer: the Women's Health Study: a randomized controlled trial. JAMA 294 (1): 56-65, 2005.15998891
Lin J, Cook NR, Albert C, et al.: Vitamins C and E and beta carotene supplementation and cancer risk: a randomized controlled trial. J Natl Cancer Inst 101 (1): 14-23, 2009.19116389
Zhang SM, Cook NR, Albert CM, et al.: Effect of combined folic acid, vitamin B6, and vitamin B12 on cancer risk in women: a randomized trial. JAMA 300 (17): 2012-21, 2008.18984888
Costa A, Formelli F, Chiesa F, et al.: Prospects of chemoprevention of human cancers with the synthetic retinoid fenretinide. Cancer Res 54 (7 Suppl): 2032s-2037s, 1994.8137334 94185068
Veronesi U, De Palo G, Marubini E, et al.: Randomized trial of fenretinide to prevent second breast malignancy in women with early breast cancer. J Natl Cancer Inst 91 (21): 1847-56, 1999.10547391 20016408
The Health Consequences of Smoking: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2004. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK44695/). Last accessed April 9, 2025.
U.S. Department of Health and Human Services: The Health Consequences of Involuntary Exposure to Tobacco Smoke: A Report of the Surgeon General. U.S. Department of Health and Human Services, Centers for Disease Control and Prevention, Coordinating Center for Health Promotion, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2006. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK44324/). Last accessed February 20, 2025.
Pirie K, Beral V, Peto R, et al.: Passive smoking and breast cancer in never smokers: prospective study and meta-analysis. Int J Epidemiol 37 (5): 1069-79, 2008.18544575
Mirick DK, Davis S, Thomas DB: Antiperspirant use and the risk of breast cancer. J Natl Cancer Inst 94 (20): 1578-80, 2002.12381712
McGrath KG: An earlier age of breast cancer diagnosis related to more frequent use of antiperspirants/deodorants and underarm shaving. Eur J Cancer Prev 12 (6): 479-85, 2003.14639125
Dale KM, Coleman CI, Henyan NN, et al.: Statins and cancer risk: a meta-analysis. JAMA 295 (1): 74-80, 2006.16391219
Bonovas S, Filioussi K, Tsavaris N, et al.: Use of statins and breast cancer: a meta-analysis of seven randomized clinical trials and nine observational studies. J Clin Oncol 23 (34): 8606-12, 2005.16260694
Newcomb PA, Trentham-Dietz A, Hampton JM: Bisphosphonates for osteoporosis treatment are associated with reduced breast cancer risk. Br J Cancer 102 (5): 799-802, 2010.20160722
Rennert G, Pinchev M, Rennert HS: Use of bisphosphonates and risk of postmenopausal breast cancer. J Clin Oncol 28 (22): 3577-81, 2010.20567021
Chlebowski RT, Chen Z, Cauley JA, et al.: Oral bisphosphonate use and breast cancer incidence in postmenopausal women. J Clin Oncol 28 (22): 3582-90, 2010.20567009
Cardwell CR, Abnet CC, Veal P, et al.: Exposure to oral bisphosphonates and risk of cancer. Int J Cancer 131 (5): E717-25, 2012.22161552
Monsees GM, Malone KE, Tang MT, et al.: Bisphosphonate use after estrogen receptor-positive breast cancer and risk of contralateral breast cancer. J Natl Cancer Inst 103 (23): 1752-60, 2011.22021667
Hue TF, Cummings SR, Cauley JA, et al.: Effect of bisphosphonate use on risk of postmenopausal breast cancer: results from the randomized clinical trials of alendronate and zoledronic acid. JAMA Intern Med 174 (10): 1550-7, 2014.25111880
Straif K, Baan R, Grosse Y, et al.: Carcinogenicity of shift-work, painting, and fire-fighting. Lancet Oncol 8 (12): 1065-1066, 2007.28581429
Kamdar BB, Tergas AI, Mateen FJ, et al.: Night-shift work and risk of breast cancer: a systematic review and meta-analysis. Breast Cancer Res Treat 138 (1): 291-301, 2013.23400581
Travis RC, Balkwill A, Fensom GK, et al.: Night Shift Work and Breast Cancer Incidence: Three Prospective Studies and Meta-analysis of Published Studies. J Natl Cancer Inst 108 (12): , 2016.27758828
Johns LE, Jones ME, Schoemaker MJ, et al.: Domestic light at night and breast cancer risk: a prospective analysis of 105 000 UK women in the Generations Study. Br J Cancer 118 (4): 600-606, 2018.29360812

## Latest Updates to This Summary (04/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Revised text to state that according to data from the Surveillance, Epidemiology, and End Results (SEER) Program, breast cancer mortality rates declined by 44% from 1989 to 2022. However, mortality rates in Black women remain about 38% higher than in White women.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about breast cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Breast Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/breast/hp/breast-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389323]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).